# Levels of Evidence for Cancer Screening and Prevention Studies (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the formal ranking system used by the PDQ Editorial Boards to assess evidence supporting the use of specific interventions or approaches. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

The PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention) reviews human studies and summarizes its understanding of the level of the evidence for the magnitude of the effect (including absolute and relative risks) for both the benefits and the harms of implementing cancer screening and prevention interventions. The Editorial Board uses the term Level of Evidence to refer to the certainty of its estimate of the health effects of implementing the intervention in question.

Typically, varying levels of evidence support each PDQ screening or prevention summary. Evidence that indicates, within a narrow range, the direction and magnitude of the effect on health outcomes is termed solid evidence. Evidence that allows an estimate of the direction and magnitude of the health outcomes within a broader range, but still allows a reasonably certain estimate, is termed fair. Evidence that allows either no estimate at all or only an estimate that is very broad is termed inadequate.

The highest Level of Evidence (solid) is generally obtained from several well-designed and well-conducted randomized controlled trials (RCTs) in generalizable settings with generalizable populations that report evidence about both benefits and harms. It is, however, not always practical to conduct such trials to address every question within the field of screening and prevention, and solid evidence from alternative study designs is often not available. There are also instances where alternative study designs can generate this solid Level of Evidence. Additionally, the PDQ Editorial Board does consider fair evidence in estimating the benefits and harms of an intervention in the general population. When the evidence for the benefits and/or harms of an intervention is inadequate, the Board states this finding.

The PDQ Editorial Board evaluates evidence in 2 steps. The first step is to describe the evidence within 5 domains (see below); the second is to judge the overall Level of Evidence as solid, fair, or inadequate. The Board conducts the same process separately for potential benefits and potential harms of each intervention. The PDQ Editorial Board does not explicitly assess the net benefit (i.e., benefits minus harms) of interventions, nor does it make recommendations.

The question at issue for the Board is to determine the direction and magnitude of important health effects from introducing the intervention into the general population. This is a question of effectiveness rather than of efficacy only, and the Board seeks evidence about effectiveness as well as efficacy. When only efficacy evidence is available, the Board must judge the additional uncertainty involved with estimating the actual health impact of widespread implementation.

## Evaluation of Evidence

The two steps in evaluating evidence are described below.

I. Description of the Evidence (The PDQ Editorial Board uses the same process for benefits and harms; the evidence referred to is the evidence relevant for answering the question of the magnitude of the health effects of widespread implementation.)
  Domains
  A. Study Design (evidence from the best studies available; ranked in descending order of strength)
    1. Evidence obtained from randomized controlled trials (see below).
    2. Evidence obtained from nonrandomized controlled trials.
    3. Evidence obtained from cohort or case-control studies.
    4. Evidence from ecologic and descriptive studies (e.g., international patterns studies, time series).
    5. Opinions of respected authorities based on clinical experience, descriptive studies, or reports of expert committees.
  B. Internal Validity: Quality of Execution Within the Study Design
    - The Editorial Board uses design-specific criteria within each research design to assess the internal validity of the evidence. At present the Board uses the criteria developed by the U.S. Preventive Services Task Force (see Table 3 in [1]). These criteria may be modified over time as needed.
  C. Consistency (coherence)/Volume of the Evidence
    - One study (small vs. large number of participants; agree vs. disagree).
    - Multiple studies (small vs. large number of participants; agree vs. disagree).
  D. Magnitude of Effects on Health Outcomes (both absolute and relative risks; as quantitative as possible; may vary for different populations)
    - Small positive/negative magnitude (benefits/harms).
    - Larger positive/negative magnitude (benefits/harms).
  E. External Validity
    - Extent to which the intervention can be applied to usual practice with the same effects as in efficacy studies.
    - Effects among people in the general population, differences with study subjects.
II. Assessment of the Evidence
  A. The level of certainty (solid, fair, inadequate) of our understanding of the direction and magnitude of the health effects (both benefits and harms) of widespread implementation.
  B. Example: Statement of Benefits
    Option 1: "Based on [solid/fair] evidence, use of intervention X [among population Y, where appropriate] leads to a reduction/increase in (a specific benefit).” [In the Evidence of Benefit section, the actual evidence is detailed, including evidence and assessment of direction and magnitude of specific benefits.]
    Option 2: "The evidence is inadequate to make a clear determination of benefit." (To be used when evidence is inadequate in amount or quality.) Alternative format depending on situation: "The evidence is inadequate to determine whether (preventive service) reduces (health problem) to a clinically or public health important degree." (Further explanation or clarification as needed.) Need to state for what outcome the evidence is inadequate, i.e., to assess a mortality effect.
  C. Example: Statement of Harms
    Option 1: “Based on [solid/fair] evidence, use of intervention X [among population Y] leads to a reduction/increase in (a specific harm).” [In the Evidence of Harm section, the actual evidence is detailed, including evidence and assessment of the direction and magnitude of specific harms.]
    Option 2: "The evidence is inadequate to make a clear determination of benefit." (To be used when evidence is inadequate in amount or quality.) Alternative format depending on situation: "The evidence is inadequate to determine whether (preventive service) reduces (health problem) to a clinically or public health important degree." (Further explanation or clarification as needed.) Need to state for what outcome the evidence is inadequate, i.e., to assess a mortality effect.

### References

Harris RP, Helfand M, Woolf SH, et al.: Current methods of the US Preventive Services Task Force: a review of the process. Am J Prev Med 20 (3 Suppl): 21-35, 2001.11306229 21203137

## Notes on Quality Assessment

1. Semantics: One can think of the level of a body of evidence as the certainty of the assessment allowed from the evidence. This may also be considered as the quality of the evidence to address a specific question. Because the word quality can have other meanings (e.g., the extent to which individual studies meet given criteria), the Editorial Board prefers the word level.
2. Certainty: Certainty can be considered in several ways, one of which is to use the heuristic of the confidence interval. This confidence interval does not come from a statistical calculation but is instead a conceptual confidence interval (CCI) representing the Editorial Board’s assessment of the range of values for direction and magnitude of the effect of the intervention that is consistent with the overall evidence. This CCI is seeking to answer an effectiveness question (not simply an efficacy question). The question at issue is:
  What would the health effects be if the intervention were widely implemented in routine practice? Even well-conducted RCTs may not provide good evidence if they are not conducted in generalizable populations, using generalizable tests and treatments. The CCI for evidence based on RCTs conducted in highly selected populations might be wide rather than narrow (fair as opposed to good) unless there are reasons to believe the effects would be the same in the general population.
3. Benefits: Potential benefits include mortality reduction (and should note whether disease-specific or overall), improved quality of life, improved function, and reduced need for invasive procedures or interventions. If mortality reduction from an RCT is disease-specific with no trend toward overall mortality reduction, then the Editorial Board might consider the contribution of this disease-specific reduction to overall mortality to be less certain. As the question at issue is an all-cause mortality question, the CCI for a study of only disease-specific reduction without other indications of overall reduction may be considered wider than if there were indications of overall mortality reduction.
4. Harms: Harms may be considered in 3 categories:
  a. Psychological (often from labeling or anxiety after a false-positive test or a diagnosis of an intermediate condition of no clinical importance).
  b. Complications from diagnostic or monitoring tests (e.g., colonoscopy with perforation for a positive FOBT).
  c. Complications or side effects from treatment, especially treatment from which there are no benefits (e.g., in the case of overdiagnosis).
5. Extrapolation: Estimates of the presence and magnitude of either benefits or harms may come from extrapolation from indirect evidence; the degree of extrapolation determines the CCI for each estimate. For example, evidence shows that screening for ovarian cancer results in many false-positive tests (due to the low prevalence of the disease) for which the workup is an invasive procedure. Other evidence could provide an estimate of the effects of the invasive workup, including not only complications but also the discomfort, anxiety, and time of reduced usual activity. The evidence, then, for the harms of screening is indirect (i.e., not from an RCT of screening) but would still provide at least fair evidence of harms (i.e., intermediate width CCI).
6. Judgment: Judgment is involved at several steps in this process, including the assessment of quality (internal validity), consistency/coherence, external validity, and the overall Level of Evidence. It is important in each case that the rationale and conclusion be as explicit and transparent as possible. The reasoning behind the judgment of the overall Level of Evidence should be stated clearly.

## Latest Updates to This Summary (01/12/2022)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Introduction

Revised text to state that the PDQ Screening and Prevention Editorial Board reviews human studies and summarizes its understanding of the level of the evidence for the magnitude of the effect for both the benefits and the harms of implementing cancer screening and prevention interventions.

Revised text to state that it is not always practical to conduct well-designed and well-conducted randomized controlled trials to address every question within the field of screening and prevention, and solid evidence from alternative study designs is often not available. Also added text to state that there are also instances where alternative study designs can generate this solid Level of Evidence.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the formal ranking system used by the PDQ Editorial Boards to assess evidence supporting the use of specific interventions or approaches. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Levels of Evidence for Cancer Screening and Prevention Studies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/levels-evidence/screening-prevention. Accessed <MM/DD/YYYY>. [PMID: 26389496]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).